# Selected Vegetables/Sun's Soup (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of selected vegetables/Sun's soup in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

NOTE: There is either no new research on this topic or the recent published research is weak and not appropriate for inclusion in the summary. Therefore, the information in this summary is no longer being updated and is provided for reference purposes only.

This cancer information summary provides an overview of the use of Selected Vegetables/Sun's Soup as a treatment for people with cancer. The summary includes a brief history of Selected Vegetables/Sun’s Soup and a review of animal and human studies. The information in the Human/Clinical Studies section is summarized in a table located at the end of that section.

This summary contains the following key information:

- “Selected Vegetables” and “Sun’s Soup” are names given to several different mixtures of vegetables and herbs that have been studied as treatments for cancer. These mixtures were developed by a single individual.
- At present, two formulations of Selected Vegetables/Sun’s Soup are marketed in the United States as dietary supplements.
- The vegetables and herbs in Selected Vegetables/Sun’s Soup are thought to have anticancer and/or immune-system–stimulating properties.
- It has been reported that treatment with Selected Vegetables/Sun’s Soup lengthened the survival of patients with advanced non-small cell lung cancer or other types of malignant tumors. However, each study tested different formulations of Selected Vegetables/Sun’s Soup, making the comparison of results across studies difficult. Furthermore, design weaknesses in the studies raise doubts about the reliability of the findings.
- The developer is conducting or contemplating additional clinical studies of Selected Vegetables/Sun’s Soup.

Many of the medical and scientific terms used in the summary are hypertext linked (at first use in each section) to the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/), which is oriented toward nonexperts. When a linked term is clicked, a definition will appear in a separate window.

Reference citations in some PDQ cancer information summaries may include links to external websites that are operated by individuals or organizations for the purpose of marketing or advocating the use of specific treatments or products. These reference citations are included for informational purposes only. Their inclusion should not be viewed as an endorsement of the content of the websites, or of any treatment or product, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board or the National Cancer Institute.

## General Information

“Selected Vegetables” and “Sun's Soup” are names given to several different mixtures of vegetables and herbs that have been studied as treatments for cancer and other medical conditions, including acquired immunodeficiency syndrome.[1,2] The original formulation contained shiitake mushroom (Lentinus edodes [Berk.] Singer), mung bean (Phaseolus radiatus L.), Hedyotis diffusa Willd. (also known by the Chinese herbal name Bai Hua She She Cao), and barbat skullcap (Scutellaria barbata D. Don, also known by the Chinese herbal name Ban Zhi Lian).

A second formulation, specifically named “Selected Vegetables” (“SV”), was tested in a phase I/II clinical trial that involved patients with advanced non-small cell lung cancer (refer to the Human/Clinical Studies section of this summary for more information).[1]

A third formulation, called “Frozen SV” or “FSV,” has also been studied clinically in patients with advanced non-small cell lung cancer (refer to the Human/Clinical Studies section of this summary for more information).[2]

In the United States, dietary supplements are regulated as foods, not drugs. Therefore, premarket evaluation and approval by the U.S. Food and Drug Administration (FDA) are not required unless specific disease prevention or treatment claims are made. The FDA can, however, remove from the market dietary supplements that it deems unsafe. It should be noted that no formulation of Selected Vegetables/Sun’s Soup has been approved by the FDA for the treatment of cancer or any other medical condition.

Because dietary supplements are not formally reviewed for manufacturing consistency, there may be considerable variation from lot to lot, and there is no guarantee that ingredients identified on product labels are present in the specified amounts or present at all.

SV/DSV and FSV are reported to contain soybean (Glycine max [L.] Merr.), shiitake mushroom, mung bean, red date (Ziziphus jujuba Miller), scallion (Allium bakeri Regel), garlic (Allium sativum L.), leek (Allium fistulosum L.), lentil (Lens culinaris Medic.), Hawthorn fruit (Crataegus monogyna Jacquin and/or Crataegus oxyacantha L.), onion (Allium cepa L.), ginseng (Panax ginseng C.A. Meyer), Angelica root (Angelica sinensis), licorice (Glycyrrhiza glabra L.), dandelion root (Taraxacum officinale Weber), senega root (Polygala senega L.), ginger (Zingiber officinale Roscoe), olive (Olea europaea L.), sesame seed (Sesamum indicum L.), and parsley (Petroselinum crispum [P. Miller] Nyman ex A.W. Hill).[1,2]

Many of the ingredients in Selected Vegetables/Sun’s Soup were chosen because previous biochemical research and traditional Chinese medicine suggested they contain molecules that have anticancer or immunostimulant activity.[1,2]

Selected Vegetables/Sun’s Soup is administered orally as part of the diet.[1,2] Studies in humans have not always specified a dose or an administration schedule, but daily doses of 30 g SV/DSV, mixed with water or other soup, or of 10 oz (approximately 283 g) FSV were used in the above-mentioned clinical studies in patients with advanced non-small cell lung cancer.[1,2]

To conduct clinical drug research in the United States, researchers must file an Investigational New Drug (IND) application with the FDA. An IND must also be obtained for clinical evaluation of dietary supplements as agents for the treatment or prevention of disease. Because the IND application process is confidential and because the existence of an IND can be disclosed only by the applicants, it is not known whether an IND currently exists for the study of Selected Vegetables/Sun’s Soup as a treatment for cancer or any other disease.

In this summary, the specific formulation of Selected Vegetables/Sun’s Soup given to individual patients or groups of patients will be identified wherever possible.

### References

Sun AS, Ostadal O, Ryznar V, et al.: Phase I/II study of stage III and IV non-small cell lung cancer patients taking a specific dietary supplement. Nutr Cancer 34 (1): 62-9, 1999.10453443 99382815
Sun AS, Yeh HC, Wang LH, et al.: Pilot study of a specific dietary supplement in tumor-bearing mice and in stage IIIB and IV non-small cell lung cancer patients. Nutr Cancer 39 (1): 85-95, 2001.11588907 21473423

## History

Selected Vegetables/Sun's Soup was first conceived as a treatment for cancer in the mid-1980s. In an effort to help a relative who was diagnosed with stage IV non-small cell lung cancer (metastasis to the left adrenal gland), the developer created a mixture that contained shiitake mushroom (Lentinus edodes [Berk.] Singer), mung bean (Phaseolus radiatus L.), Hedyotis diffusa Willd., and barbat skullcap (Scutellaria barbata D. Don) in the belief that these plant materials had anticancer and/or immune-system–stimulating properties. After the relative appeared to benefit from this treatment (the relative was reported to be alive and cancer free for more than 13 years ), three additional patients (one with stage IV kidney cancer that had metastasized to the lungs, one with stage IV kidney cancer that had metastasized to the liver and to the lungs, and one with stage IV non-small cell lung cancer that had metastasized to the brain) were treated with a variant of the original mixture (i.e., a combination of shiitake mushroom and mung bean). (Note: No explanation has been given for the omission of Hedyotis diffusa and barbat skullcap for these patients.) These additional patients were also said to benefit from vegetable/herb treatment. (Refer to the Human/Clinical Studies section of this summary for more information.)

In June 1992, the developer filed a patent application for the “Herbal treatment of malignancy,” and a patent was awarded in August 1995. Also in June 1992, the developer initiated a clinical trial in the Czech Republic to test Selected Vegetables/Sun’s Soup as a treatment for advanced non-small cell lung cancer.[1] A second clinical study (a nonconsecutive case series) that also involved patients with advanced non-small cell lung cancer was completed in 1997.[2] It is unclear, however, when patient accrual for this second study began.[2] In both reports of the clinical study results, the authors concluded that patients who received Selected Vegetables/Sun’s Soup had prolonged survival.[1,2] (Refer to the Human/Clinical Studies section of this summary for more information.)

As noted previously (refer to the General Information section of this summary for more information), the proposed mechanism of action for Selected Vegetables/Sun’s Soup involves anticancer and/or immune-system–stimulating activities associated with some of the ingredients.[1,2] The following types of compounds likely found in Selected Vegetables/Sun’s Soup have been investigated for these activities: protease inhibitors and autoclave-resistant factors, which are found in soybeans (Glycine max L. Merr.); plant sterols; saponin; inositol hexaphosphate (IP6); beta-glucans; lectins; coumestans such as coumestrol; and isoflavones such as daidzein, genistein, biochanin A, and formononetin.[1,2]

One beta-glucan found in shiitake mushroom (lentinan) has been used as an adjunctive therapy for cancer (primarily gastric cancer and colorectal cancer) in Japan.[3-6] Treatment with lentinan has been reported to prolong the survival of patients with gastric cancer [3-6] and to improve their quality of life.[3] However, lentinan may not be an active component in Selected Vegetables/Sun’s Soup. This compound has a large molecular mass and is believed to have only limited oral bioavailability.[5-7] Therefore, lentinan has usually been given by intravenous injection. Nonetheless, other substances in shiitake mushroom have been identified as having greater oral bioavailability, and these substances have shown anticancer activity in animal experiments.[5,7]

### References

Sun AS, Ostadal O, Ryznar V, et al.: Phase I/II study of stage III and IV non-small cell lung cancer patients taking a specific dietary supplement. Nutr Cancer 34 (1): 62-9, 1999.10453443 99382815
Sun AS, Yeh HC, Wang LH, et al.: Pilot study of a specific dietary supplement in tumor-bearing mice and in stage IIIB and IV non-small cell lung cancer patients. Nutr Cancer 39 (1): 85-95, 2001.11588907 21473423
Nakano H, Namatame K, Nemoto H, et al.: A multi-institutional prospective study of lentinan in advanced gastric cancer patients with unresectable and recurrent diseases: effect on prolongation of survival and improvement of quality of life. Kanagawa Lentinan Research Group. Hepatogastroenterology 46 (28): 2662-8, 1999 Jul-Aug.10522061 99451535
Taguchi T: Clinical efficacy of lentinan on patients with stomach cancer: end point results of a four-year follow-up survey. Cancer Detect Prev Suppl 1: 333-49, 1987.3121179 88080247
Borchers AT, Stern JS, Hackman RM, et al.: Mushrooms, tumors, and immunity. Proc Soc Exp Biol Med 221 (4): 281-93, 1999.10460691 99390263
Kidd PM: The use of mushroom glucans and proteoglycans in cancer treatment. Altern Med Rev 5 (1): 4-27, 2000.10696116 20161032
Wasser SP, Weis AL: Therapeutic effects of substances occurring in higher Basidiomycetes mushrooms: a modern perspective. Crit Rev Immunol 19 (1): 65-96, 1999.9987601 99142074

## Laboratory/Animal/Preclinical Studies

Only limited information is available from laboratory or animal studies of Selected Vegetables/Sun's Soup. The developer’s patent document describes four animal experiments that used two mouse tumor models (mouse sarcoma S1509a, which was used in three of the experiments, and mouse Line 1 lung carcinoma, which was used in one experiment) and that evaluated shiitake mushroom (Lentinus edodes [Berk.] Singer), mung bean (Phaseolus radiatus L.), Hedyotis diffusa Willd., and barbat skullcap (Scutellaria barbata D. Don).

In these experiments, small groups of mice were fed either standard laboratory chow or laboratory chow that had been mixed with one or more of the four named substances. The mice were fed these diets both before and after they received subcutaneous injections of tumor cells. Results presented in the patent document show that tumor growth was slower in mice fed the experimental diets (i.e., containing the substances) than in mice fed standard laboratory chow. However, the greatest inhibition of tumor growth (up to 85% inhibition) was observed in animals fed diets that contained both mung bean and shiitake mushroom.

Results of two additional animal experiments were reported by the developer in a peer-reviewed scientific journal.[1] One experiment was a repetition of the Line 1 lung carcinoma experiment that was described in the developer’s patent document. The results of this experiment were similar to those reported previously: tumor growth was slower in animals fed the experimental diets, with the greatest inhibition of tumor growth (up to 82% inhibition) observed in animals fed a diet that contained both mung bean and shiitake mushroom.

The second experiment also used the Line 1 lung carcinoma tumor model. In this experiment, tumor growth was measured in mice fed either standard laboratory chow or a mixture of standard laboratory chow and DSV (i.e., the commercially available freeze-dried formulation of Selected Vegetables/Sun’s Soup; refer to the General Information section of this summary for more information). Tumor growth was approximately 2.3 times slower (i.e., approximately 65% growth inhibition) in mice fed standard laboratory chow plus DSV than in mice fed standard laboratory chow alone.

### References

Sun AS, Yeh HC, Wang LH, et al.: Pilot study of a specific dietary supplement in tumor-bearing mice and in stage IIIB and IV non-small cell lung cancer patients. Nutr Cancer 39 (1): 85-95, 2001.11588907 21473423

## Human/Clinical Studies

The following information is summarized in a table located at the end of this section.

The use of Selected Vegetables/Sun's Soup as a treatment for human cancer has been investigated in only a limited manner. All available resources—the developer’s patent document and the published reports of two clinical studies [1,2]—have identified fewer than 50 treated patients.

In 1992, the developer initiated a phase I/II clinical trial in the Czech Republic to test Selected Vegetables/Sun’s Soup as a treatment for non-small cell lung cancer.[1,2] The trial included a “toxicity arm” to assess the tolerability of long-term administration of Selected Vegetables/Sun’s Soup and a “survival arm” to assess the mixture’s ability to improve survival in patients with advanced disease. Five patients with stage I cancer were included in the toxicity arm; these patients were treated with conventional therapy (surgery plus radiation therapy or radiation therapy alone) in addition to Selected Vegetables/Sun’s Soup. Nineteen patients with stage III or stage IV disease were included in the survival arm; six of these patients were treated with conventional therapy (radiation therapy alone or chemotherapy alone) in addition to Selected Vegetables/Sun’s Soup, and 13 were treated with conventional therapy (radiation therapy alone, chemotherapy alone, surgery plus radiation therapy, or chemotherapy plus radiation therapy) (12 patients) or best supportive care (one patient) but not Selected Vegetables/Sun’s Soup.

The intended duration of Selected Vegetables/Sun’s Soup treatment for all patients who received the mixture was 24 months. The intended daily dose was 30 g of freeze-dried powder (i.e., DSV; refer to the General Information section of this summary for more information), mixed with water or other soup. Changes in body weight and changes in Karnofsky Performance Status (KPS) were measured in both arms of the trial. Median survival time was the primary endpoint in the survival arm.

In the toxicity arm, all five patients either gained weight or had no change in weight, which was measured twice, i.e., at study entry and 4 to 12 months later. The KPS score, which was also measured twice (at study entry and 3 months later), improved for four of the five patients and remained stable for the fifth. All five individuals were reported to be alive and well 24 months after diagnosis, and none developed a recurrent tumor during follow-up. The actual duration of Selected Vegetables/Sun’s Soup treatment for these patients ranged from more than 17 months to more than 24 months. From these data, the researchers concluded that Selected Vegetables/Sun’s Soup was safe, nontoxic, and well tolerated.[1]

In the survival arm, the average duration of Selected Vegetables/Sun’s Soup treatment was 7.3 months (range, 4–17 months). The median survival time from diagnosis for the six patients who ingested Selected Vegetables/Sun’s Soup was 15.5 months (range, 8 to more than 24 months), compared with a median survival time from diagnosis of 4 months (range, 1–12 months) for the 13 patients in the control group. This difference in median survival time was reported to be statistically significant.[1]

As in the toxicity arm, body weight and KPS were measured twice in the survival arm. Body-weight measurements were made at study entry and at an average of 4.8 months later (range, 3–7 months) for the six patients in the Selected Vegetables/Sun’s Soup treatment group. Among the 13 patients in the control group, nine had weight measurements made at study entry and at an average of 2.6 months later (range, 1–7 months); however, the second body-weight measurements were not available for four control subjects. The average percent body-weight loss for the six patients in the Selected Vegetables/Sun’s Soup treatment group was 2.1%; for the nine patients in the control group, the average percent body-weight loss was 11.6%. This 9.5% difference in body-weight loss was reported to be statistically significant. The two groups of patients had similar average body weights at study entry.[1]

KPS was measured at study entry and again 3 months later for all six patients in the Selected Vegetables/Sun’s Soup treatment group. For the 13 patients in the control group, KPS was measured at study entry and 1 to 3 months later. The first and second KPS scores did not differ substantially for the patients in the Selected Vegetables/Sun’s Soup treatment group. In fact, the second score was higher (indicating an improving condition) for five of the six patients; for the sixth patient, the first and second scores were the same. The second KPS score was lower than the first (indicating a worsening condition) for all 13 patients in the control group. When the average KPS score at study entry for the control subjects was compared with the average score measured 1 to 3 months later, a statistically significant decline in KPS was noted. The average KPS score at study entry for the patients in the control group was not substantially different from the average KPS score at study entry for patients in the Selected Vegetables/Sun’s Soup treatment group.[1]

Although treatment with Selected Vegetables/Sun’s Soup was associated with substantial benefits in this trial, the results cannot be considered conclusive. Several major weaknesses in the design and execution of the trial could have affected the outcome. One major weakness is the small numbers of patients enrolled in the survival arm (six patients in the Selected Vegetables/Sun’s Soup treatment group and 13 in the control group). Larger numbers of patients are needed to obtain reliable results. Another weakness is that the patients in the survival arm were not randomly assigned to the treatment group and the control group. The treatment group consisted of individuals who agreed to be treated with Selected Vegetables/Sun’s Soup; those who refused treatment were assigned to the control group. It is possible that important, unidentified differences existed between patients in the two groups.[1]

In 2001, the developer reported clinical findings for an additional 16 patients who had stage III or stage IV non-small cell lung cancer and who had been treated with Selected Vegetables/Sun’s Soup.[2] The formulation ingested by these patients was Frozen SV, or FSV.[2] Among the 16 patients, 12 consumed FSV for a period of 2 months or more and were considered eligible for analysis. The duration of FSV treatment for these 12 patients ranged from 5 months to more than 46 months. All of the patients were treated with conventional therapy (one or more of the following: surgery, radiation therapy, chemotherapy, or pleurodesis) in addition to treatment with Selected Vegetables/Sun’s Soup.

Among these 12 patients, two had no residual tumor after surgery to remove the primary tumor (n = 1) or surgery to remove the primary tumor and a contralateral lymph node metastasis (n = 1). The patient with the lymph node metastasis consumed FSV for more than 32 months and remained tumor free more than 30 months. This patient survived more than 33 months. The other patient ingested FSV for 14 months and survived 20 months. No information was available concerning the tumor-free period for this second patient.

Among the ten remaining eligible patients, two were reported to have had a complete response to therapy. One of the patients had surgery to remove the primary tumor and then chemotherapy, radiation therapy, and FSV therapy to treat pleural effusion. This patient ingested FSV for 5 months and was still alive at the end of the study period (more than 8 months later). The other patient had surgery to remove the primary tumor, and then radiation therapy and FSV therapy to treat brain and bone metastases. This patient consumed FSV for 16 months and survived 22 months. No information was available about the duration of the tumor-free period for the remaining patient.

Among the eight remaining eligible patients, three had a partial response to treatment, and four had stable or progressive disease. Tumor response data were not available for one eligible patient.

Overall, the median survival time for the 12 eligible patients was 33.5 months, which is substantially longer than the median survival times cited by the developer for historical control subjects (range, 4–15 months).[2] Furthermore, the KPS score, which was measured at the start of FSV treatment and again 5 or more months later, improved for all but one of the eligible patients. On average, the second KPS score was 63% higher than the first score.[2]

As in the case of the phase I/II trial, the results of this nonconsecutive case series should be viewed with caution. Once again, a number of major weaknesses in the design of this clinical study could have influenced its outcome. Among these weaknesses are the following:

- The study included only a small number of patients.
- The survival analysis relied on comparisons with historical control subjects rather than an actual control group.
- All of the patients in the study were aware of the reported benefits of Selected Vegetables/Sun’s Soup and had actively sought treatment with it.

With respect to the third point, it is important to note that results obtained with such highly motivated, self-selected patients might not be typical of those obtained with most patients diagnosed with advanced non-small cell lung cancer.

A randomized phase III trial (NCT00246727 (https://www.cancer.gov/clinicaltrials/NCT00246727)) of patients with stage IIIB or stage IV non-small cell lung cancer was conducted. The primary objective was to compare the survival of patients receiving Selected Vegetables Sun's Soup dietary supplement with those receiving a placebo while undergoing treatment with best supportive care (i.e., radiation therapy, surgery, or palliative care).

Reported Use of Selected Vegetables/Sun’s Soup as a Treatment for Human Cancer^a^

Principal Reference Citation | Type of Study/Report | Type of Cancer | No. of Patients: Enrolled; Treated; Control^b^ | Strongest Benefit Reported | Concurrent Therapy^c^ | Level of Evidence Score^d^
Herbal Treatment of Malignancy. US Patent 5437866. August 1, 1995 | Anecdotal report (patent document) | Metastatic kidney or non-small cell lung | 4; 4; None | Complete tumor regression, 3 patients | Yes | None
[1] | Phase I/II trial | Early non-small cell lung (toxicity study) | 5; 5; None | Improved Karnofsky performance status, 4 patients | Yes | None
[2] | Nonconsecutive case series | Advanced non-small cell lung | 16; 12; None | Improved median survival | Yes, 10 of 12 evaluated patients | 3iiiA

No. = number.

^a^Refer to text and the NCI Dictionary of Cancer Terms (https://www.cancer.gov/publications/dictionaries/cancer-terms/) for additional information and definition of terms.

^b^Number of patients treated plus number of patients controlled may not equal number of patients enrolled; number of patients enrolled = number of patients initially recruited/considered by the researchers who conducted a study; number of patients treated = number of enrolled patients who were administered the treatment being studied AND for whom results were reported; historical control subjects are not included in number of patients enrolled.

^c^Surgery, chemotherapy, radiation therapy, hormone therapy, pleurodesis administered/allowed at same time as treatment with Selected Vegetables/Sun’s Soup.

^d^For information about levels of evidence analysis and an explanation of the level of evidence score, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### References

Sun AS, Ostadal O, Ryznar V, et al.: Phase I/II study of stage III and IV non-small cell lung cancer patients taking a specific dietary supplement. Nutr Cancer 34 (1): 62-9, 1999.10453443 99382815
Sun AS, Yeh HC, Wang LH, et al.: Pilot study of a specific dietary supplement in tumor-bearing mice and in stage IIIB and IV non-small cell lung cancer patients. Nutr Cancer 39 (1): 85-95, 2001.11588907 21473423

## Adverse Effects

The only reported adverse effect with the use of Selected Vegetables/Sun's Soup was a feeling of fullness or bloatedness when freeze-dried Selected Vegetables (SV) was consumed in the amount specified in the phase I/II clinical trial.[1] No adverse effects were reported after ingestion of frozen SV.[2]

### References

Sun AS, Ostadal O, Ryznar V, et al.: Phase I/II study of stage III and IV non-small cell lung cancer patients taking a specific dietary supplement. Nutr Cancer 34 (1): 62-9, 1999.10453443 99382815
Sun AS, Yeh HC, Wang LH, et al.: Pilot study of a specific dietary supplement in tumor-bearing mice and in stage IIIB and IV non-small cell lung cancer patients. Nutr Cancer 39 (1): 85-95, 2001.11588907 21473423

## Summary of the Evidence for Selected Vegetables/Sun's Soup

Existing data supporting the effectiveness of Selected Vegetables/Sun's Soup as a treatment for cancer are limited and weak. Only two clinical studies have been reported in the peer-reviewed scientific literature.[1,2] These studies tested the ability of Selected Vegetables/Sun’s Soup to prolong the survival of patients with advanced non-small cell lung cancer. Although ingestion of Selected Vegetables/Sun’s Soup was associated with improved survival in both studies, the results may not be reliable because of the small numbers of patients included in the studies (i.e., a total of 18 evaluable patients) and because of other major weaknesses in the designs of the studies. Different formulations of Selected Vegetables/Sun’s Soup were used in the two studies, making a comparison of the results difficult. Information about the effectiveness of Selected Vegetables/Sun’s Soup as a treatment for other types of cancer is found only in anecdotal reports, and the US Patent 5437866. and no information is available about the safety or the efficacy of this treatment approach in pediatric patients. Additional larger, well-designed clinical studies that test identical formulations of vegetables and herbs are necessary to determine more clearly whether Selected Vegetables/Sun’s Soup can be useful in the treatment of non-small cell lung and other types of cancer.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For additional information about levels of evidence analysis, refer to Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### References

Sun AS, Ostadal O, Ryznar V, et al.: Phase I/II study of stage III and IV non-small cell lung cancer patients taking a specific dietary supplement. Nutr Cancer 34 (1): 62-9, 1999.10453443 99382815
Sun AS, Yeh HC, Wang LH, et al.: Pilot study of a specific dietary supplement in tumor-bearing mice and in stage IIIB and IV non-small cell lung cancer patients. Nutr Cancer 39 (1): 85-95, 2001.11588907 21473423

## Latest Updates to This Summary (08/24/2018)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of selected vegetables/Sun's soup in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Selected Vegetables/Sun's Soup. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/suns-soup-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389301]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).